# Ovarian, Fallopian Tube, and Primary Peritoneal Cancers Prevention (PDQ®)

Patient Version

This PDQ cancer information summary has current information about ovarian, fallopian tube, and primary peritoneal cancers prevention. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Date Last Modified") is the date of the most recent change. The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Screening and Prevention Editorial Board.

## What Is Prevention?

Cancer prevention is action taken to lower the chance of getting cancer. By preventing cancer, the number of new cases of cancer in a group or population is lowered. Hopefully, this will lower the number of deaths caused by cancer.

To prevent new cancers from starting, scientists look at risk factors and protective factors. Anything that increases your chance of developing cancer is called a cancer risk factor; anything that decreases your chance of developing cancer is called a cancer protective factor.

Some risk factors for cancer can be avoided, but many cannot. For example, both smoking and inheriting certain genes are risk factors for some types of cancer, but only smoking can be avoided. Regular exercise and a healthy diet may be protective factors for some types of cancer. Avoiding risk factors and increasing protective factors may lower your risk, but it does not mean that you will not get cancer.

Different ways to prevent cancer are being studied, including:

- Changing lifestyle or eating habits.
- Avoiding things known to cause cancer.
- Taking medicines to treat a precancerous condition or to keep cancer from starting.

## General Information About Ovarian, Fallopian Tube, and Primary Peritoneal Cancers

Key Points for This Section
- Ovarian, fallopian tube, and primary peritoneal cancers are diseases in which malignant (cancer) cells form in the ovaries, fallopian tubes, or peritoneum.
- Ovarian cancer is the leading cause of death from cancer of the female reproductive system.

### Ovarian, fallopian tube, and primary peritoneal cancers are diseases in which malignant (cancer) cells form in the ovaries, fallopian tubes, or peritoneum.

The ovaries are a pair of organs in the female reproductive system. They are in the pelvis, one on each side of the uterus (the hollow, pear-shaped organ where a fetus grows). Each ovary is about the size and shape of an almond. The ovaries make eggs and female hormones (chemicals that control the way certain cells or organs work in the body).

The fallopian tubes are a pair of long, slender tubes, one on each side of the uterus. Eggs pass from the ovaries, through the fallopian tubes, to the uterus. Cancer sometimes begins at the end of the fallopian tube near the ovary and spreads to the ovary.

The peritoneum is the tissue that lines the abdominal wall and covers organs in the abdomen. Primary peritoneal cancer is cancer that forms in the peritoneum and has not spread there from another part of the body. Cancer sometimes begins in the peritoneum and spreads to the ovary.

Anatomy of the female reproductive system. The organs in the female reproductive system include the uterus, ovaries, fallopian tubes, cervix, and vagina. The uterus has a muscular outer layer called the myometrium and an inner lining called the endometrium.

Anatomy of the female reproductive system; drawing shows the uterus, myometrium (muscular outer layer of the uterus), endometrium (inner lining of the uterus), ovaries, fallopian tubes, cervix, and vagina.

### Ovarian cancer is the leading cause of death from cancer of the female reproductive system.

Ovarian cancer is most common in postmenopausal women. From 2012 to 2021, the number of new cases of ovarian cancer decreased slightly each year. There was also a slight decrease in the number of deaths from ovarian cancer each year from 2013 to 2022.

Women who have a family history of ovarian cancer and/or have inherited certain changes in genes, such as the BRCA1 or BRCA2 gene, have a higher risk than those who do not have a family history or who have not inherited these gene changes. For women with inherited risk, genetic counseling and genetic testing can be used to find out more about their likelihood of developing ovarian cancer.

It is hard to find ovarian cancer early. Early ovarian cancer may not cause any symptoms. When symptoms do appear, ovarian cancer is often advanced.

Other PDQ summaries containing information related to ovarian, fallopian tube, and primary peritoneal cancers include:

- Genetics of Breast and Gynecologic Cancers (written for health professionals)
- Ovarian, Fallopian Tube, and Primary Peritoneal Cancers Screening
- Ovarian Epithelial, Fallopian Tube, and Primary Peritoneal Cancers Treatment

## Ovarian, Fallopian Tube, and Primary Peritoneal Cancers Prevention

Key Points for This Section
- Avoiding risk factors and increasing protective factors may help prevent cancer.
- The following are risk factors for ovarian, fallopian tube, and primary peritoneal cancers:
  - Family history of ovarian, fallopian tube, and primary peritoneal cancers
  - Inherited risk
  - Hormone replacement therapy
  - Weight and height
  - Endometriosis
- The following are protective factors for ovarian, fallopian tube, and primary peritoneal cancers:
  - Oral contraceptives
  - Tubal ligation
  - Giving birth
  - Salpingectomy
  - Breastfeeding
  - Risk-reducing salpingo-oophorectomy
- It is not clear whether the following affect the risk of ovarian, fallopian tube, and primary peritoneal cancers:
  - Diet
  - Alcohol
  - Aspirin and nonsteroidal anti-inflammatory drugs
  - Talc
  - Infertility treatment
- Cancer prevention clinical trials are used to study ways to prevent cancer.
- New ways to prevent ovarian, fallopian tube, and primary peritoneal cancers are being studied in clinical trials.

### Avoiding risk factors and increasing protective factors may help prevent cancer.

Avoiding cancer risk factors may help prevent certain cancers. Risk factors include smoking, having overweight, and not getting enough exercise. Increasing protective factors such as quitting smoking and exercising may also help prevent some cancers. Talk to your doctor or other health care professional about how you might lower your risk of cancer.

### The following are risk factors for ovarian, fallopian tube, and primary peritoneal cancers:

#### Family history of ovarian, fallopian tube, and primary peritoneal cancers

A woman whose mother or sister had ovarian cancer has an increased risk of ovarian cancer. A woman with two or more relatives with ovarian cancer also has an increased risk of ovarian cancer.

#### Inherited risk

The risk of ovarian cancer is increased in women who have inherited certain changes in genes, such as the BRCA1 or BRCA2 gene.

The risk of ovarian cancer is also increased in women who have certain inherited syndromes, such as:

- Familial site-specific ovarian cancer syndrome.
- Familial breast/ovarian cancer syndrome.
- Hereditary nonpolyposis colorectal cancer (HNPCC; also called Lynch syndrome).

#### Hormone replacement therapy

There is a slightly increased risk of ovarian cancer in women who are taking hormone replacement therapy (HRT) after menopause. There is also an increased risk of ovarian cancer in women who have recently used HRT, even if they used it for less than 5 years. The risk of ovarian cancer is the same for HRT with estrogen only or with combined estrogen and progestin. HRT taken through the skin may have a lower risk than HRT taken by mouth. When HRT is stopped, the risk of ovarian cancer decreases over time. The risk of ovarian cancer is not affected by the age of the woman when taking HRT.

#### Weight and height

Having excess body weight or obesity is linked to an increased risk of ovarian cancer. Obesity is also linked to an increased risk of death from ovarian cancer. Being tall may also be linked to a slight increase in the risk of ovarian cancer.

#### Endometriosis

Women who have endometriosis have an increased risk of ovarian cancer.

### The following are protective factors for ovarian, fallopian tube, and primary peritoneal cancers:

#### Oral contraceptives

Taking oral contraceptives ("the pill") lowers the risk of ovarian cancer. The longer oral contraceptives are used, the lower the risk may be. The decrease in risk may last up to 30 years after a woman has stopped taking oral contraceptives.

Taking oral contraceptives increases the risk of blood clots. This risk is higher in women who also smoke.

#### Tubal ligation

The risk of ovarian cancer is decreased in women who have a tubal ligation (surgery to close both fallopian tubes).

#### Giving birth

Women who have given birth have a decreased risk of ovarian cancer compared to women who have not given birth. Giving birth to more than one child further decreases the risk of ovarian cancer.

#### Salpingectomy

Some studies have shown that salpingectomy (surgery to remove one or both fallopian tubes) is linked to a decreased risk of ovarian cancer. When both fallopian tubes are removed, the risk of ovarian cancer is lowered more than when one fallopian tube is removed.

#### Breastfeeding

Breastfeeding is linked to a decreased risk of ovarian cancer. The longer a woman breastfeeds, the lower her risk of ovarian cancer. Women who breastfeed for at least 8 to 10 months have the greatest decrease in risk of ovarian cancer.

#### Risk-reducing salpingo-oophorectomy

Some women who have a high risk of ovarian cancer may choose to have a risk-reducing salpingo-oophorectomy (surgery to remove the fallopian tubes and ovaries when there are no signs of cancer). This includes women who have inherited certain changes in the BRCA1 or BRCA2 gene or have an inherited syndrome.

It is very important to have a cancer risk assessment and counseling before making this decision. These and other factors may be discussed:

- Infertility.
- Early menopause: The drop in estrogen levels caused by removing the ovaries can cause early menopause. Symptoms of menopause can worsen and include:
  - Hot flashes.
  - Night sweats.
  - Trouble sleeping.
  - Mood changes.
  - Decreased sex drive.
  - Heart disease.
  - Vaginal dryness.
  - Frequent urination.
  - Osteoporosis (decreased bone density).
  These symptoms may not be the same in all women. Hormone replacement therapy (HRT) may be used to lessen these symptoms.
- Risk of ovarian cancer in the peritoneum: Women who have had a risk-reducing salpingo-oophorectomy continue to have a small risk of ovarian cancer in the peritoneum (thin layer of tissue that lines the inside of the abdomen). This is rare, but may occur if ovarian cancer cells had already spread to the peritoneum before the surgery or if some ovarian tissue remains after surgery.

### It is not clear whether the following affect the risk of ovarian, fallopian tube, and primary peritoneal cancers:

#### Diet

Studies of dietary factors have not found a strong link to ovarian cancer.

#### Alcohol

Studies have not shown a link between drinking alcohol and the risk of ovarian cancer.

#### Aspirin and nonsteroidal anti-inflammatory drugs

Some studies of aspirin and nonsteroidal anti-inflammatory drugs (NSAIDs) have found a decreased risk of ovarian cancer and others have not.

#### Talc

Studies of women who used talcum powder (talc) dusted on the perineum (the area between the vagina and the anus) have not found clear evidence of an increased risk of ovarian cancer.

#### Infertility treatment

Overall, studies in women using fertility drugs have not found clear evidence of an increased risk of ovarian cancer. The risk of invasive ovarian cancer may be higher in women who do not get pregnant after taking fertility drugs.

### Cancer prevention clinical trials are used to study ways to prevent cancer.

Cancer prevention clinical trials are used to study ways to lower the risk of developing certain types of cancer. Some cancer prevention trials include healthy people who may or may not have an increased risk of cancer. Other prevention trials include people who have had cancer and are trying to prevent recurrence or a second cancer.

The purpose of some cancer prevention clinical trials is to find out whether actions people take can prevent cancer. These may include eating fruits and vegetables, exercising, quitting smoking, or taking certain medicines, vitamins, minerals, or food supplements.

### New ways to prevent ovarian, fallopian tube, and primary peritoneal cancers are being studied in clinical trials.

Information about clinical trials supported by NCI can be found on NCI’s clinical trials search (https://www.cancer.gov/research/participate/clinical-trials-search) webpage. Clinical trials supported by other organizations can be found on the ClinicalTrials.gov website.

## About This PDQ Summary

### About PDQ

Physician Data Query (PDQ) is the National Cancer Institute's (NCI's) comprehensive cancer information database. The PDQ database contains summaries of the latest published information on cancer prevention, detection, genetics, treatment, supportive care, and complementary and alternative medicine. Most summaries come in two versions. The health professional versions have detailed information written in technical language. The patient versions are written in easy-to-understand, nontechnical language. Both versions have cancer information that is accurate and up to date and most versions are also available in Spanish (https://www.cancer.gov/espanol/publicaciones/pdq).

PDQ is a service of the NCI. The NCI is part of the National Institutes of Health (NIH). NIH is the federal government’s center of biomedical research. The PDQ summaries are based on an independent review of the medical literature. They are not policy statements of the NCI or the NIH.

### Purpose of This Summary

This PDQ cancer information summary has current information about ovarian, fallopian tube, and primary peritoneal cancers prevention. It is meant to inform and help patients, families, and caregivers. It does not give formal guidelines or recommendations for making decisions about health care.

### Reviewers and Updates

Editorial Boards write the PDQ cancer information summaries and keep them up to date. These Boards are made up of experts in cancer treatment and other specialties related to cancer. The summaries are reviewed regularly and changes are made when there is new information. The date on each summary ("Updated") is the date of the most recent change.

The information in this patient summary was taken from the health professional version, which is reviewed regularly and updated as needed, by the PDQ Screening and Prevention Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/screening-prevention).

### Clinical Trial Information

A clinical trial is a study to answer a scientific question, such as whether one treatment is better than another. Trials are based on past studies and what has been learned in the laboratory. Each trial answers certain scientific questions in order to find new and better ways to help cancer patients. During treatment clinical trials, information is collected about the effects of a new treatment and how well it works. If a clinical trial shows that a new treatment is better than one currently being used, the new treatment may become "standard." Patients may want to think about taking part in a clinical trial. Some clinical trials are open only to patients who have not started treatment.

Clinical trials can be found online at NCI's website (https://www.cancer.gov/research/participate/clinical-trials). For more information, call the Cancer Information Service (https://www.cancer.gov/contact/contact-center) (CIS), NCI's contact center, at 1-800-4-CANCER (1-800-422-6237).

### Permission to Use This Summary

PDQ is a registered trademark. The content of PDQ documents can be used freely as text. It cannot be identified as an NCI PDQ cancer information summary unless the whole summary is shown and it is updated regularly. However, a user would be allowed to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks in the following way: [include excerpt from the summary].”

The best way to cite this PDQ summary is:

PDQ® Screening and Prevention Editorial Board. PDQ Ovarian, Fallopian Tube, and Primary Peritoneal Cancers Prevention. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/ovarian/patient/ovarian-prevention-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389375]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use in the PDQ summaries only. If you want to use an image from a PDQ summary and you are not using the whole summary, you must get permission from the owner. It cannot be given by the National Cancer Institute. Information about using the images in this summary, along with many other images related to cancer can be found in Visuals Online (https://visualsonline.cancer.gov/). Visuals Online is a collection of more than 3,000 scientific images.

### Disclaimer

The information in these summaries should not be used to make decisions about insurance reimbursement. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s E-mail Us (https://www.cancer.gov/contact/email-us).